# Hospice (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about hospice care in advanced cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Health care professionals and health care systems face many challenges when caring for patients at the end of life (EOL). While hospice is designed specifically for EOL care, patients may decline it for valid reasons. These reasons may include difficulty accepting mortality, the desire to enroll in a clinical trial for a progressive cancer with no other standard treatment options, or the desire to continue receiving transfusions for a hematological malignancy. However, for patients with advanced cancer who prioritize comfort, hospice is the recommended model of care. It is important for oncologists to understand the requirements for and services provided by hospice care as they refer and counsel patients and families.

## About Hospice

Hospice uses an interdisciplinary approach to provide expert medical care, pain management, and emotional and spiritual support for patients with advanced cancer who:

- Have a prognosis of 6 months or less if their disease runs its natural course.
- Choose not to receive therapies that are primarily intended to prolong life or that treat the underlying disease but do not provide symptomatic benefit.

Such treatments may include continued use of cancer-directed therapies, the use of machines such as a ventilator or dialysis, or artificial nutrition or hydration. These types of therapies are often referred to as life-prolonging treatment or disease-directed therapy. However, clinicians may vary in their use of those terms and how they categorize specific therapies. Additionally, while a Do Not Resuscitate (DNR) order is not a requirement for hospice care, the patient’s wishes for hospice may need additional clarification if they desire Full Code status (resuscitation measures are given to keep a patient alive).

In contrast to life-prolonging treatment, hospice care focuses on quality of life. A unique aspect of hospice is that in addition to the patient, it intentionally considers the family as part of the unit of care. Support and education for family members are critical aspects of hospice care, including after the patient has died.

The current delivery of hospice in the United States is based on the Medicare hospice care benefit (https://www.medicare.gov/coverage/hospice-care), which began in 1982. The Centers for Medicare and Medicaid Services (CMS) provides oversight for the administration of the Medicare hospice care benefit and has published health and safety requirements that hospice agencies are required to meet, called the Conditions of Participation (https://www.ecfr.gov/current/title-42/chapter-IV/subchapter-B/part-418?toc=1). In general, these requirements shape the structure and operations of hospice agencies. Patients may receive hospice care from an insurer other than Medicare, such as Medicaid or private insurance; the specific regulations for that care are variable. In this summary, the term hospice refers to an approach to care, as well as to health care organizations that deliver hospice care. Information related to regulatory requirements, such as eligibility, coverage, and required services, is specific to the CMS Conditions of Participation and the Medicare hospice care benefit.

### Hospice Versus Palliative Care

Hospice care is similar to palliative care in that both are interdisciplinary approaches to providing symptom management and support to a broad group of patients with serious illness. However, palliative care is provided to patients who are concurrently receiving curative and life-prolonging therapies, as well as to patients who do not meet the criteria for hospice care or who decline hospice enrollment due to associated restrictions. These criteria and restrictions are described below.

### Benefits of Hospice

Hospice care offers many benefits to patients, their families, and caregivers, including the following:

- A holistic approach to care by an interdisciplinary care team. This team consists of a group of health care professionals from different disciplines working together to deliver care. The hospice care team may also be described as the interdisciplinary team.
- 24/7 access to on-call nurses and other clinicians.
- Specialty symptom management and psychosocial support.
- Better quality of life for patients and families, with families being more likely to report their loved ones had a “good death” with hospice care.[1-3] One study of 332 patients with advanced cancer found that longer time spent in hospice care (>2 months) was associated with significantly better quality of life, compared with patients who received more aggressive medical care.[4][Level of evidence: II]
- Lower levels of post-traumatic stress disorder, prolonged grief, and physical and emotional distress among family members of patients who die at home with hospice, compared with family members of those who die in the hospital or intensive care unit.[5]
- Decreased hospitalization, intensive care utilization, and emergency room visits.[6];[7][Level of evidence: II]
- Increased likelihood of dying in a nonacute care setting [8] and increased likelihood of dying at home for patients who prefer to do so.[9][Level of evidence: III]
- Reduced health care expenses for patients in the last year of life.[7][Level of evidence: II]

### Determining Appropriateness for Hospice

To qualify for hospice care, patients must have a life expectancy of 6 months or less if the illness runs its normal course.

Patients who are appropriate for hospice desire a comfort-oriented approach and wish to forego life-prolonging and curative treatments. Hospice is often considered when patients continue to decline despite therapy, when curative or life-prolonging treatments are no longer deemed beneficial, and when the burdens of curative or life-prolonging treatments outweigh their benefits.

A DNR order is not a requirement for hospice care. However, a patient referred for hospice who desires Full Code status may need further clarification around what hospice care entails and their wishes for EOL care.

#### Patients for whom hospice is not appropriate

The following types of patients are not appropriate candidates for hospice:

- Patients who would qualify for hospice but want to receive active cancer-directed treatment and/or enroll in clinical trials.
- Patients who want to return to the hospital for treatment of infection, dehydration, or other complications. Note that if a patient is in hospice care and goes to the emergency department or is admitted to the hospital, he or she may be financially responsible for these charges if they are outside the hospice plan of care. For more information, see Financial Aspects of Hospice.

Several specific therapies may be barriers to patients receiving hospice care. The potential to receive these therapies varies among hospice agencies and depends on a patient’s specific clinical history. These therapies include the following:

- Blood product transfusions. Transfusions are generally not available in hospice, though they may be coordinated in rare circumstances.
- Dialysis. Ongoing dialysis is generally not available in hospice. However, some hospice agencies may agree to cover dialysis for a set time, with a plan to then discontinue. Additionally, some hospice providers may consider the need for dialysis to be unrelated to the patient’s terminal prognosis, which would allow the patient to continue receiving dialysis through their primary insurance.
- Radiation therapy. While radiation therapy can have symptomatic benefits, coverage varies across hospices, as the therapy can be expensive. It may be more feasible for a hospice to cover radiation therapy if it can be consolidated into one fraction.
- Artificial nutrition and hydration. Some hospices may agree to cover artificial nutrition and/or hydration for a set period if it aligns with the goals of the patient and family.
- Parenteral and oral antibiotics. Some hospices may agree to cover parenteral and oral antibiotics for a set period if it aligns with the goals of the patient and family.

### References

Cagle JG, Pek J, Clifford M, et al.: Correlates of a good death and the impact of hospice involvement: findings from the national survey of households affected by cancer. Support Care Cancer 23 (3): 809-18, 2015.25194877
Teno JM, Clarridge BR, Casey V, et al.: Family perspectives on end-of-life care at the last place of care. JAMA 291 (1): 88-93, 2004.14709580
Wallston KA, Burger C, Smith RA, et al.: Comparing the quality of death for hospice and non-hospice cancer patients. Med Care 26 (2): 177-82, 1988.3339915
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Wright AA, Keating NL, Balboni TA, et al.: Place of death: correlations with quality of life of patients with cancer and predictors of bereaved caregivers' mental health. J Clin Oncol 28 (29): 4457-64, 2010.20837950
Bergman J, Saigal CS, Lorenz KA, et al.: Hospice use and high-intensity care in men dying of prostate cancer. Arch Intern Med 171 (3): 204-10, 2011.20937914
Obermeyer Z, Makar M, Abujaber S, et al.: Association between the Medicare hospice benefit and health care utilization and costs for patients with poor-prognosis cancer. JAMA 312 (18): 1888-96, 2014.25387186
Saito AM, Landrum MB, Neville BA, et al.: Hospice care and survival among elderly patients with lung cancer. J Palliat Med 14 (8): 929-39, 2011.21767153
Jeurkar N, Farrington S, Craig TR, et al.: Which hospice patients with cancer are able to die in the setting of their choice? Results of a retrospective cohort study. J Clin Oncol 30 (22): 2783-7, 2012.22734023

## Understanding Hospice Care

Hospice is intended to provide practically all the care that a patient needs. Its comprehensive coverage has several components, including an interdisciplinary team, multiple levels of care to meet patient and caregiver needs, and bereavement care.

### The Hospice Interdisciplinary Team

Hospice engages an interdisciplinary team to care for patients and families. This team includes the following:

- Registered hospice nurse. Often called the case manager, this person is responsible for skilled nursing care, including symptom management and wound care, education of the family and caregivers, and coordination of other team members. The registered hospice nurse also assesses patient and family needs during each visit and assesses safety concerns.
- Hospice attending physician. This person is the designated attending physician who provides hospice services along with the hospice agency. The patient can request their primary oncologist to be the hospice attending physician, which allows continued involvement in the patient’s care. If the hospice attending physician is not available on evenings or weekends, then the hospice medical director can fill in.
- Hospice medical director. This person serves as the medical expert in symptom management and assists with administrative duties. The hospice medical director works for the hospice and can assume the role of hospice attending physician if desired by the patient or will work with the patient’s designated attending clinician. The hospice medical director is also responsible for evaluating a patient’s prognosis at each certification period to determine eligibility to remain in hospice.
- Social worker. This person provides broad psychosocial support for patients, families, and caregivers; assists with accessing local resources for caregiving and social supports; and discusses funeral planning and bereavement.
- Chaplain. A chaplain addresses the spiritual needs of patients, families, and caregivers. This individual can offer support for all patients, regardless of religious beliefs, and can liaise with other clergy as needed. A chaplain may also provide bereavement services.
- Hospice aides. Hospice aides are certified nursing assistants who provide personal care to the patient, including bathing, toileting, dressing, feeding, and oral care. They are typically available for limited amounts of time.
- Hospice volunteers. These people serve as companions to people at end of life. They help family caregivers in a variety of ways. Hospice agencies also use volunteers to help with administrative tasks.
- Additional services. Physical therapy, occupational therapy, pharmacy assistance, speech therapy, and nutrition support are provided based on need and availability. While these services vary among hospices, they are generally limited and consist of a one-time evaluation and education session. Some hospices may also offer additional services such as massage therapy, Reiki therapy, and music therapy.

### Frequency of Visits by Team Members

One of the biggest misunderstandings of home hospice care is the perception that the agency provides 24-hour caregiving. In fact, family members or other caregivers, including friends, privately paid caregivers, or facility staff, are primarily responsible for the patient’s day-to-day care. The number and frequency of visits by hospice team members vary, depending on the hospice agency and patient need. Nursing visits are required only every 14 days at a minimum; however, they may occur more often, even daily, depending on the situation. Hospice teams provide access to triage care 24 hours per day via telephone to respond to any acute issues.

### Location of Hospice Care

Hospice care can be provided anywhere the patient calls home, including the patient’s actual home, a nursing home, an assisted living facility, a freestanding inpatient facility (often called a hospice home), a homeless shelter, a prison, or a hospital.

### Levels of Hospice Care

The four levels of hospice care delivery include the following:

- Routine care. This level of care applies to most hospice patients. The patient is generally stable, and the patient's symptoms, like pain or nausea and vomiting, are adequately controlled. Care is generally delivered in the patient’s residence, either a home or facility.
- Continuous home care. This coverage can be added when a patient has unmanaged symptoms, such as severe pain needing frequent assessment and dose adjustment, respiratory distress, or delirium requiring frequent change of medication dose or schedule. The hospice agency can provide nurses who are present in the patient’s home/location of care for 8 to 24 hours per day to give medications for the period of time that symptoms are not managed. This level of care is intended to be short-term.
- General inpatient care. This crisis-like level of care is for patients with symptoms that cannot be managed in a home-like environment. This level of care is intended to be short-term and may be delivered in a hospital, nursing home, or inpatient hospice facility, depending on the hospice agency. Patients must be assessed daily and, once stabilized, are returned to a lower level of care. General inpatient care cannot be used in the last few days of life in a hospital if symptoms are controlled. If a patient qualifies for this level of care, room and board will be covered by the health insurance plan.
- Respite care. This temporary care provides time off for the patient’s primary caregivers. This is often used for a temporary breakdown in support at home or when caregivers have temporary needs that make them unable to deliver care, such as an out-of-town trip or having a medical procedure of their own. It may be provided in a hospital, nursing home, or inpatient hospice facility, depending on the hospice agency. Respite care is generally available for five consecutive nights every 60 to 90 days.

### Bereavement Care

Grief is a normal reaction to the experience of losing a loved one through death. Most individuals experience normal grief after a loss, in which they gradually move toward acceptance of the loss and can continue with daily activities. However, some individuals may experience complicated grief, which is characterized by persistent and pervasive distress leading to disability.[1] Supportive services in the form of bereavement care and grief counseling can benefit individuals with both normal and complicated grief.[2-5];[6][Level of evidence: I] For more information, see Grief, Bereavement, and Coping With Loss.

Bereavement care is a mandated component of all hospice programs. The Centers for Medicare and Medicaid Services (CMS) requires hospices to include a pastoral or other counselor as a member of the interdisciplinary team. When a patient is admitted to hospice, the interdisciplinary team must complete a bereavement assessment to evaluate the social, spiritual, and cultural factors that may impact the family’s ability to cope with the patient’s death. This assessment is then integrated into the patient’s hospice plan of care. Additionally, CMS mandates that every hospice must have an organized program for bereavement that provides services to families and other individuals for up to 1 year following the death of the patient.

This continued access to bereavement services is one of the primary benefits of hospice care for family members. Even if the patient is only enrolled with hospice for a short period of time before death, the ongoing bereavement support can be immensely valuable for families and caregivers. However, there can be significant variability across hospice programs in the type of bereavement services offered. For example, a national web-based survey of 591 hospices reported that while 98% of hospices offer telephone calls or cards to bereaved family members, only 79% offer grief support groups and only 71% offer individual therapy.[7] Clinicians, patients, and families may wish to consider the scope of bereavement service offerings in selecting a hospice program.

### References

Prigerson HG, Horowitz MJ, Jacobs SC, et al.: Prolonged grief disorder: Psychometric validation of criteria proposed for DSM-V and ICD-11. PLoS Med 6 (8): e1000121, 2009.19652695
Boelen PA, de Keijser J, van den Hout MA, et al.: Treatment of complicated grief: a comparison between cognitive-behavioral therapy and supportive counseling. J Consult Clin Psychol 75 (2): 277-84, 2007.17469885
Rosner R, Pfoh G, Kotoučová M: Treatment of complicated grief. Eur J Psychotraumatol 2: , 2011.22893810
Piper WE, McCallum M, Joyce AS, et al.: Patient personality and time-limited group psychotherapy for complicated grief. Int J Group Psychother 51 (4): 525-52, 2001.11582899
Piper WE, Ogrodniczuk JS, Joyce AS, et al.: Group composition and group therapy for complicated grief. J Consult Clin Psychol 75 (1): 116-25, 2007.17295570
Shear K, Frank E, Houck PR, et al.: Treatment of complicated grief: a randomized controlled trial. JAMA 293 (21): 2601-8, 2005.15928281
Barry CL, Carlson MD, Thompson JW, et al.: Caring for grieving family members: results from a national hospice survey. Med Care 50 (7): 578-84, 2012.22310561

## Disparities in Hospice Utilization

Multiple studies have consistently shown disparities in hospice enrollment. Populations who are less likely to be enrolled in hospice care at the end of life (EOL) include the following:

- Patients identifying as belonging to a racial or ethnic minority group.[1-5] One study of 54,256 Medicare beneficiaries who had undergone lung, esophageal, pancreatic, colon, or rectal cancer resection found that White patients were more likely than Black and Hispanic patients to use hospice care (odds ratio [OR] 1.24; 95% confidence interval [CI], 1.17–1.31).[2]
- Patients living in rural environments.[3,6] A study of 31,460 Medicare beneficiaries with pancreatic cancer found that patients in small towns (adjusted OR, 0.77; 95% CI, 0.69–0.86) and rural areas (adjusted OR, 0.75; 95% CI, 0.66–0.85) had lower adjusted odds of receiving hospice care than patients in metropolitan areas.[6]
- Patients with lower socioeconomic status.[3]

Prospective studies are needed to better define hospice utilization disparities and help identify methods to narrow this gap in care. Specific interventions geared to these populations may include:

- Implementing hospice education programs for patients and caregivers that are culturally tailored to specific groups.[7]
- Providing access to non-English, relevant educational and advance care planning materials and offering additional training to language interpreters related to advanced illness and the EOL.[8]
- Prioritizing access to hospice care in rural and socioeconomically disadvantaged settings.[9]

### References

Paredes AZ, Hyer JM, Palmer E, et al.: Racial/Ethnic Disparities in Hospice Utilization Among Medicare Beneficiaries Dying from Pancreatic Cancer. J Gastrointest Surg 25 (1): 155-161, 2021.32193849
Abbas A, Madison Hyer J, Pawlik TM: Race/Ethnicity and County-Level Social Vulnerability Impact Hospice Utilization Among Patients Undergoing Cancer Surgery. Ann Surg Oncol 28 (4): 1918-1926, 2021.33057860
Parajuli J, Tark A, Jao YL, et al.: Barriers to palliative and hospice care utilization in older adults with cancer: A systematic review. J Geriatr Oncol 11 (1): 8-16, 2020.31699676
Mullins MA, Ruterbusch JJ, Clarke P, et al.: Trends and racial disparities in aggressive end-of-life care for a national sample of women with ovarian cancer. Cancer 127 (13): 2229-2237, 2021.33631053
Smith AK, Earle CC, McCarthy EP: Racial and ethnic differences in end-of-life care in fee-for-service Medicare beneficiaries with advanced cancer. J Am Geriatr Soc 57 (1): 153-8, 2009.19054185
Ramkumar N, Wang Q, Brooks GA, et al.: Association of rurality with utilization of palliative care and hospice among Medicare beneficiaries who died from pancreatic cancer: A cohort study. J Rural Health 39 (3): 557-564, 2023.36631820
Jones T, Luth EA, Lin SY, et al.: Advance Care Planning, Palliative Care, and End-of-life Care Interventions for Racial and Ethnic Underrepresented Groups: A Systematic Review. J Pain Symptom Manage 62 (3): e248-e260, 2021.33984460
Dressler G, Cicolello K, Anandarajah G: "Are They Saying It How I'm Saying It?" A Qualitative Study of Language Barriers and Disparities in Hospice Enrollment. J Pain Symptom Manage 61 (3): 504-512, 2021.32828932
Tobin J, Rogers A, Winterburn I, et al.: Hospice care access inequalities: a systematic review and narrative synthesis. BMJ Support Palliat Care 12 (2): 142-151, 2022.33608254

## Barriers to Hospice Utilization

Barriers to hospice utilization include multiple variables among patients and caregivers, oncology providers, and hospice agencies.

### Patient and Caregiver Perspectives

Studies of patient and caregiver perspectives have identified several types of barriers to hospice utilization:

- Discussing end-of-life (EOL) care may be difficult for patients, as it may be perceived as signaling weakness and failure.[1]
- A patient’s understanding of their prognosis influences their EOL decisions. Patients who report their cancer as “likely curable” are significantly less likely to enroll in hospice, compared with patients who report their health status as “terminally ill.” [2] For more information, see the Preference for information about prognosis section in Communication in Cancer Care.
- There are widespread misperceptions regarding hospice eligibility and coverage.[3] Families may be uncertain about the value of hospice or may think hospice is only for the final hours to days of life.[4]
- Patients may have concerns about losing continuity with their current health care providers.[4]
- Some patients and families referred to hospice may decline to enroll based on the initial visit, expressing concerns about how hospice care is presented, such as focusing on which services are not covered.[4]

### Oncology Provider Perspective

Oncology providers determining whether or not to refer to hospice care may experience:

- Difficulty prognosticating a 6-month life expectancy based on the unpredictability of specific cancer types and the evolving treatment landscape.[5]
- Hesitancy to discuss EOL care planning with patients and families.[5]

### Hospice Agency Perspective

Hospice agencies may have the following concerns:

- Patients who do not have adequate caregiving support at home may present safety issues and require more care than the hospice can provide.
- Patients with an unclear prognosis may have a long length of stay in hospice, which is a quality measure scrutinized by the Centers for Medicare and Medicaid Services.[5]
- There may be financial barriers. The daily hospice rate may not cover expensive care, and hospice may not be able to pay for more expensive care. A national survey of 591 hospice providers found that 78% had at least one policy in place that may restrict access for patients with potentially high-cost medical care needs. Smaller hospices and for-profit hospices reported more limited enrollment policies.[6]
- Hospice workforce shortages may limit the ability to accept referrals and take on new patients.

### Addressing Misconceptions About Hospice

Patients, families, and providers may hold common misconceptions about hospice. It may be helpful for clinicians to educate individuals on the following points:

- The goal of opioids is to provide comfort, not to hasten death. The goal is to optimize comfort by managing pain and air hunger. A study of opioids at the EOL found no impact on survival.[7]
- Once patients receive hospice care, they can always change their mind. Patients can revoke hospice and revert to their former insurance coverage. For example, if a patient changes his or her mind and wants to receive cancer-directed therapy and to be admitted to the hospital for a cancer-related complication, the patient can sign papers to revoke the hospice benefit, and regular insurance will resume.
- Hospice care is not limited to patients in the last days or weeks of life. Any patient with an expected prognosis of 6 months or less could be eligible for hospice. Patients are often not referred to hospice until very late in their disease course, resulting in short lengths of stay in hospice and reduced opportunities to benefit from care by the interdisciplinary team.
- Hospice coverage is not limited to 6 months of care. As long as a patient continues to meet the criteria for the hospice benefit, there is no limit to the duration of coverage. Patients on hospice are evaluated regularly for prognosis. Even if they have already received 6 months of hospice, if the hospice physician thinks their life expectancy remains less than 6 months, the patient can continue on hospice care.
- Hospice does not provide 24/7 care in the home. Except in crisis situations or for respite care, hospice only provides a limited number of home health aide hours and nursing visits per week. The responsibility for daily care is fulfilled by family or other caregivers. The minimum requirement for nursing visits by a hospice is once every 14 days.
- A Do Not Resuscitate order is not mandatory to enroll in hospice. As the patient experiences functional decline, the interdisciplinary hospice team will continue to have discussions about goals of care, including resuscitation at the EOL. If after ongoing discussion with the hospice team, the patient and family wish to continue Full Code status, they would typically need to activate emergency services at the time of significantly worsening condition and seek care outside the hospice plan of care.

### References

Mrig EH, Spencer KL: Political economy of hope as a cultural facet of biomedicalization: A qualitative examination of constraints to hospice utilization among U.S. end-stage cancer patients. Soc Sci Med 200: 107-113, 2018.29421457
Gray TF, Plotke R, Heuer L, et al.: Perceptions of prognosis and end-of-life care outcomes in patients with advanced lung and gastrointestinal cancer. Palliat Med 37 (5): 740-748, 2023.36802979
Cagle JG, Van Dussen DJ, Culler KL, et al.: Knowledge About Hospice: Exploring Misconceptions, Attitudes, and Preferences for Care. Am J Hosp Palliat Care 33 (1): 27-33, 2016.25138649
Vig EK, Starks H, Taylor JS, et al.: Why don't patients enroll in hospice? Can we do anything about it? J Gen Intern Med 25 (10): 1009-19, 2010.20535577
Patel MN, Nicolla JM, Friedman FAP, et al.: Hospice Use Among Patients With Cancer: Trends, Barriers, and Future Directions. JCO Oncol Pract 16 (12): 803-809, 2020.33186083
Aldridge Carlson MD, Barry CL, Cherlin EJ, et al.: Hospices' enrollment policies may contribute to underuse of hospice care in the United States. Health Aff (Millwood) 31 (12): 2690-8, 2012.23213153
Morita T, Tsunoda J, Inoue S, et al.: Effects of high dose opioids and sedatives on survival in terminally ill cancer patients. J Pain Symptom Manage 21 (4): 282-9, 2001.11312042

## Financial Aspects of Hospice

Payment for hospice care is covered by one of the following and paid to the hospice agency:

- Medicare Part A.
- Medicaid.
- HMO.
- Private insurance.
- Veteran benefits.

Current reimbursement rates for hospice care are usually based on a per-diem rate determined by the patient’s level of care (see the Levels of Hospice Care section) and geographic location. Hospice is intended to pay for practically all the medical care the patient receives. Typically, this care includes the following:

- Visits from interdisciplinary team members, excluding hospice attending professional fees, which may be billed separately to Medicare.
- Durable medical equipment, such as a hospital bed, wheelchair, shower bench, and bedside commode.
- Prescription medications for symptom management and those related to the patient’s terminal condition.

### Exclusions from Coverage

Hospice is not responsible for care that is outside of the hospice plan of care. In general, if adult patients attend health care visits that are not coordinated with and approved by the hospice agency, they may be financially liable for the cost of that care. Similarly, if patients seek hospitalization with life-prolonging therapies while on hospice care, they may be financially liable for the cost of that care. Patients may always revoke hospice services and revert to prior insurance to seek hospitalization and life-prolonging therapies. These general rules do not apply to pediatric patients younger than 21 years (see the Pediatric Hospice section) or veterans who receive care through U.S. Department of Veterans Affairs health care systems (see the Concurrent Care With Hospice Care section).

While certain therapies or interventions may provide comfort or palliate symptoms, they may still not be covered by hospice if they are cost prohibitive. Frequent examples are blood product transfusions, dialysis, and palliative radiation or cancer-directed therapy. Coverage for these therapies varies by hospice. If the patient wants these therapies while in hospice, the oncologist should contact the hospice agency directly to see if these services can be covered.

Additionally, hospice does not cover room and board at a nursing home or assisted living facility and does not cover 24-hour care at home.

### Billing Guidance for Patients in Hospice

When enrolling patients in hospice, the hospice team becomes responsible for managing their insurance benefit, coordinating patient care, and reviewing all health care appointments. Medicare will only pay for the professional services of medically necessary visits with an oncologist if this provider is serving as the hospice attending physician (see The Hospice Interdisciplinary Team section). Medicare will not separately reimburse for laboratory tests, medical imaging, or procedures related to the terminal diagnosis. Oncologists may need to add specific modifiers to their claims to be reimbursed.

If the oncologist is not the hospice attending physician, the professional services fees will go to the hospice agency, and the patient will likely be financially responsible unless another arrangement was previously approved by the hospice agency.

## Pediatric Hospice

Among the 30,000 pediatric deaths each year in the United States, approximately 8,000 children (27%) and their families with any health condition use hospice care at the end of life.[1][Level of evidence: III];[2] The percentage of pediatric patients with cancer who use hospice ranges from 35% to 80%.[3];[4,5][Level of evidence: III];[6]

Hospice care is available to pediatric patients with advanced cancer and is considered one form of palliative care. Licensed hospice agencies provide services, although many in the United States lack pediatric services, and most hospice nurses lack expertise in pediatric care.[7] Pediatric hospice care is often given in the home but can occasionally be provided in self-standing hospice houses or inpatient units, depending on the county a patient lives in or the particular hospice organization. Pediatric hospice services generally include nursing, physician, home health aide, psychosocial, spiritual, therapy, and bereavement services, as well as symptom-focused medication and durable medical equipment. Pediatric hospice may not be available to all children depending on their level of medical complexity, technology dependence, insurance, and where they live.

Pediatric hospice has significant differences compared with adult hospice. A major difference is that many children can receive concurrent care, meaning they can receive hospice services while continuing to receive any and all other services indicated for treating their terminal illness. In 2010, the Concurrent Care for Children Provision (Section 2302) of the Patient Protection and Affordable Care Act specified that children and adolescents younger than 21 years with a life expectancy of less than 6 months who are enrolled in Medicaid or the Children’s Health Insurance Program can receive both hospice services and life-extending or disease-directed cancer therapy. This law removed “foregoing curative therapy” as a criterion for hospice admission in this patient population, although patients and families with private insurance or those who do not wish to continue medical treatments continue to have access to standard comfort-focused hospice care.[8] Children with cancer who receive concurrent care hospice services can continue to receive chemotherapy, targeted therapy, radiation therapy, clinical trials, and transfusions, for example, to try to slow the growth of cancer or manage side effects. A 2011–2013 study of Medicaid recipients with a variety of diagnoses showed that concurrent care resulted in longer length of stays (88.5 days vs. 48.8 days) and reduced hospice discharges (by a factor of 3), although it did not reduce emergency or inpatient care.[9]

Compared with adult patients, children referred to hospice often have very complex medical, technological, equipment, prescription, and social needs, leading to higher costs.[10,11] A comprehensive upfront sign-out and ongoing communication between primary medical teams and hospice teams is recommended to reduce communication gaps, family frustration, and feelings of abandonment.

One of the most significant misconceptions about pediatric hospice care pertains to losing the primary or hospital-based team. When patients receive concurrent hospice care, they and their families may continue to receive reimbursable medical care and visits with their primary oncology and palliative care teams, while simultaneously receiving home-based hospice services. Other misconceptions about pediatric hospice are similar to those for adult-focused hospice care. For more information, see the Addressing Misconceptions About Hospice section.

Table 1 shows a brief comparison of adult and pediatric hospice.[12,13]

Table 1. Comparing Adult and Pediatric Hospice

Adult Hospice | Concurrent Care Pediatric Hospice
Focus on improving quality of life for patients with terminal illness | Focus on improving quality of life for patients with terminal illness
Restricted to patients with a life expectancy of 6 months or less if the disease runs its natural course | Restricted to patients with a life expectancy of 6 months or less if the disease runs its natural course
Restricts delivery of disease-directed or life-prolonging therapies | Permits concurrent delivery of hospice care and treatment of the terminal illness (in most cases)
Program requirements and regulations set at the federal level and are consistent across states | Program requirements and regulations set at the state level and can vary broadly across states in scope and coverage of services
Broadly accessible throughout the United States | Accessibility is variable throughout the United States

Disparities in hospice use and end-of-life care for pediatric patients have been documented. Results vary, depending on the study, institution, and location. In a retrospective observational study of 1,492 children, of whom 44% had Medicaid and 56% had commercial insurance, those with Medicaid were less likely to die at home (relative risk [RR], 0.82; 95% confidence interval [CI], 0.73–0.92). Overall, 40% of children died at home, and 45% enrolled in hospice for a median of 2 days. Hospice enrollment rates did not vary by insurance type. However, Medicaid-enrolled children spent less time in hospice care than privately insured children. The effect of race on hospice enrollment has varied by study, with some institutional studies showing no effect. However, in a larger claims-based study, among children with Medicaid, Black children were the least likely to enroll in hospice (RR, 0.71; 95% CI, 0.55–0.91).[14][Level of evidence: III] In a separate study of U.S. decedents from the Shared Data and Research database, 79 pediatric patients who died of cancer from 2017 to 2021 often reported more than two distressing symptoms before death, yet only 17% enrolled in hospice. Children in families with an annual household income of $50,000 or less were less likely to receive hospice care than those in families with higher incomes.[15] In addition, several studies have shown that even when enrolled in hospice or receiving pediatric palliative care, Black children were less likely to die at home [14,16] and more likely to receive hospital-based intensive interventions at the end of life, [17] although this may be goal-concordant.[18]

Patients referred to pediatric hospice often have very complex medical and social needs. These needs often warrant more comprehensive sign-out and ongoing communication between primary medical teams and hospice teams.

### References

Keim-Malpass J, Cozad MJ, Svynarenko R, et al.: Medical complexity and concurrent hospice care: A national study of Medicaid children from 2011 to 2013. J Spec Pediatr Nurs 26 (4): e12333, 2021.33811725
Lindley LC, Cohrs AC, Keim-Malpass J, et al.: Children Enrolled in Hospice Care Under Commercial Insurance: A Comparison of Different Age Groups. Am J Hosp Palliat Care 36 (2): 123-129, 2019.30037270
Kaye EC, Gushue CA, DeMarsh S, et al.: Illness and end-of-life experiences of children with cancer who receive palliative care. Pediatr Blood Cancer 65 (4): , 2018.29218773
Thienprayoon R, Lee SC, Leonard D, et al.: Racial and ethnic differences in hospice enrollment among children with cancer. Pediatr Blood Cancer 60 (10): 1662-6, 2013.23733549
Brock KE, Steineck A, Twist CJ: Trends in End-of-Life Care in Pediatric Hematology, Oncology, and Stem Cell Transplant Patients. Pediatr Blood Cancer 63 (3): 516-22, 2016.26513237
Brock KE, DeGroote NP, Roche A, et al.: The Supportive Care Clinic: A Novel Model of Embedded Pediatric Palliative Oncology Care. J Pain Symptom Manage 64 (3): 287-297.e1, 2022.35618251
Kaye EC, Gattas M, Kiefer A, et al.: Provision of Palliative and Hospice Care to Children in the Community: A Population Study of Hospice Nurses. J Pain Symptom Manage 57 (2): 241-250, 2019.30391654
Lindley LC, Keim-Malpass J, Svynarenko R, et al.: Pediatric Concurrent Hospice Care: A Scoping Review and Directions for Future Nursing Research. J Hosp Palliat Nurs 22 (3): 238-245, 2020.32282559
Lindley LC, Cozad MJ, Mack JW, et al.: Effectiveness of Pediatric Concurrent Hospice Care to Improve Continuity of Care. Am J Hosp Palliat Care 39 (10): 1129-1136, 2022.34866426
Dingfield L, Bender L, Harris P, et al.: Comparison of pediatric and adult hospice patients using electronic medical record data from nine hospices in the United States, 2008-2012. J Palliat Med 18 (2): 120-6, 2015.25411904
Cozad MJ, Svynarenko R, Hinds PS, et al.: Pediatric Concurrent Hospice Care: Cost Implications of a Hybrid Payment Model. Am J Hosp Palliat Care 39 (12): 1436-1442, 2022.35437021
Keim-Malpass J, Hart TG, Miller JR: Coverage of palliative and hospice care for pediatric patients with a life-limiting illness: a policy brief. J Pediatr Health Care 27 (6): 511-6, 2013.24055071
National Hospice and Palliative Care Organization: NHPCO Pediatric Facts and Figures. Alexandria, VA: National Hospice and Palliative Care Organization, 2023. Available online (https://www.nhpco.org/wp-content/uploads/NHPCO_Pediatric_Facts_Figures_2023.pdf) Last accessed Nov. 19, 2024.
Johnston EE, Davis ES, Bhatia S, et al.: Location of death and hospice use in children with cancer varies by type of health insurance. Pediatr Blood Cancer 69 (8): e29521, 2022.34962704
Ananth P, Lindsay M, Nye R, et al.: End-of-life care quality for children with cancer who receive palliative care. Pediatr Blood Cancer 69 (9): e29841, 2022.35686746
Cawkwell PB, Gardner SL, Weitzman M: Persistent racial and ethnic differences in location of death for children with cancer. Pediatr Blood Cancer 62 (8): 1403-8, 2015.25787675
Johnston EE, Alvarez E, Saynina O, et al.: Disparities in the Intensity of End-of-Life Care for Children With Cancer. Pediatrics 140 (4): , 2017.28963112
Umaretiya PJ, Li A, McGovern A, et al.: Race, ethnicity, and goal-concordance of end-of-life palliative care in pediatric oncology. Cancer 127 (20): 3893-3900, 2021.34255377

## Coordination Between Hospice and Emergency Medical Systems

Hospice is responsible for practically all care of the patient, including any urgent or emergent needs that occur during the day or after hours. Hospices provide 24-hour access to an emergency line and can make urgent visits for patient needs. This service is encouraged so the hospice can manage the situation with guidance for caregivers, an urgent visit to the home, or a higher level of care, such as continuous home care or general inpatient care.

However, patients receiving hospice care may still engage with the traditional emergency medical system. This may happen if the patient or family calls 911 or goes to the emergency department. In some cases, the hospice may instruct the family to proceed to the emergency department if they cannot manage the emergency situation. Examples include unmanaged symptoms, a change in goals of care, and a new serious injury such as a hip fracture.

These situations can be difficult for emergency medical teams because patients enrolled in hospice may not want the invasive procedures or hospitalizations that would be indicated for patients focused on life prolongation. Important information related to these scenarios includes the following:

- Emergency medical staff should be notified that the patient is enrolled in hospice as soon as possible. Families may call 911 out of instinct during a crisis, but the patient’s goals of care may remain comfort focused. This should be clarified as soon as possible to determine the plan of care. Providers referring hospice patients to the emergency department should clearly communicate to the emergency team about the consult question and the patient’s code status, prognosis, and patient preferences.
- The hospice agency should be notified that the patient is engaging with emergency medical services. The hospice can coordinate with the emergency medical team to clarify what would be included in the hospice plan of care and to determine if hospice resources can manage the emergency situation, such as having the patient transfer to an inpatient hospice facility.
- Patients may be liable for the cost of emergency care that is outside of the hospice plan of care. Care should be coordinated with the hospice staff to determine what interventions would be supported. If patients wish to pursue treatment that is outside the hospice plan of care, such as hospitalization or intensive care, they can either assume financial responsibility or revoke hospice care. When hospice care is revoked, patients immediately revert to their primary insurance.

## Alternative Models of Hospice Care

### Concurrent Care With Hospice Care

One alternative model of hospice care is concurrent care with hospice, which is offered by U.S. Department of Veterans Affairs health care systems.

This model allows veterans to enroll in hospice care without restricting palliative treatments such as infusion therapies, transfusion of blood products, oral cancer agent administration, and palliative radiation. The use of the Concurrent Care model and hospice care have increased significantly in recent years.[1] This approach has been associated with less aggressive medical treatment, including lower likelihood of being admitted to an intensive care unit, and lower medical costs.[2]

### Medicare Care Choices Model

The Medicare Care Choices Model (MCCM) tested offering eligible beneficiaries the option to receive supportive hospice services at the end of life (EOL) without forgoing payment for treatment of their terminal conditions, which is required to enroll in the traditional Medicare hospice benefit. Enrollment at participating hospices occurred over a 5 ½-year period, from Jan. 1, 2016, to June 30, 2021.

According to Medicare’s analysis, MCCM participants were more likely than matched Medicare beneficiaries to have the following outcomes:[3]

- Greater likelihood of enrolling in the Medicare hospice benefit.
- Improved quality of EOL care, including more days spent at home.
- Reduced use of resource-intensive services, including 26% fewer inpatient hospital admissions and 14% fewer outpatient emergency department visits and observation stays.
- Reduced Medicare expenditures of $9,080 (17%) for MCCM participants compared with matched Medicare beneficiaries.

The positive results of this program are likely to influence future Medicare hospice models.

### References

Presley CJ, Han L, O'Leary JR, et al.: Concurrent Hospice Care and Cancer-Directed Treatment for Advanced Lung Cancer and Receipt of Aggressive Care at the End of Life in the Veteran's Health Administration. J Palliat Med 23 (8): 1038-1044, 2020.32119800
Mor V, Wagner TH, Levy C, et al.: Association of Expanded VA Hospice Care With Aggressive Care and Cost for Veterans With Advanced Lung Cancer. JAMA Oncol 5 (6): 810-816, 2019.30920603
Kranker K, Niedzwiecki R, Pohl V: Evaluation of the Medicare Care Choices Model: Annual Report 4. Baltimore, MD: Center for Medicare and Medicaid Services, April 2022. Available online (https://www.cms.gov/priorities/innovation/data-and-reports/2022/mccm-fourth-annrpt).

## Latest Updates to This Summary (11/20/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

About Hospice

Added level of evidence II.

Added level of evidence III.

Understanding Hospice Care

Added level of evidence I.

Pediatric Hospice

Added level of evidence III.

Added level of evidence III.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about issues related to hospice planning, care, and finances. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Hospice are:

- Katharine Brock, MD, MS (Children's Healthcare of Atlanta)
- Jared R. Lowe, MD, HMDC (University of North Carolina School of Medicine)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Hospice. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/planning/hospice-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38261695]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).